# Skin Cancer Screening (PDQ®)

Patient Version

This PDQ cancer information summary has current information about skin cancer screening. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What is screening?

Screening is looking for cancer before a person has any symptoms. This can help find cancer at an early stage. When abnormal tissue or cancer is found early, it may be easier to treat. By the time symptoms appear, cancer may have begun to spread.

Scientists are trying to better understand which people are more likely to get certain types of cancer. They also study the things we do and the things around us to see if they cause cancer. This information helps doctors recommend who should be screened for cancer, which screening tests should be used, and how often the tests should be done.

It is important to remember that your doctor does not necessarily think you have cancer if he or she suggests a screening test. Screening tests are given when you have no cancer symptoms.

If a screening test result is abnormal, you may need to have more tests done to find out if you have cancer. These are called diagnostic tests.

## General Information About Skin Cancer

Key Points for This Section
- Skin cancer is a disease in which malignant (cancer) cells form in the tissues of the skin.
- Skin cancer is the most common cancer in the United States.
- Different factors increase or decrease the risk of skin cancer.

### Skin cancer is a disease in which malignant (cancer) cells form in the tissues of the skin.

The skin is the body's largest organ. It protects against heat, sunlight, injury, and infection. Skin also helps control body temperature and stores water, fat, and vitamin D. The skin has several layers, but the two main layers are the epidermis (top or outer layer) and the dermis (lower or inner layer). Skin cancer begins in the epidermis, which is made up of three kinds of cells:

- Squamous cells: Thin, flat cells that form the top layer of the epidermis. Cancer that forms in squamous cells is called squamous cell carcinoma of the skin.
- Basal cells: Round cells under the squamous cells. Cancer that forms in basal cells is called basal cell carcinoma.
- Melanocytes: Found in the lower part of the epidermis, these cells make melanin, the pigment that gives skin its natural color. When skin is exposed to the sun, melanocytes make more pigment and cause the skin to tan, or darken. Cancer that forms in melanocytes is called melanoma.

Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue.

Skin anatomy; drawing shows layers of the epidermis, dermis, and subcutaneous tissue including hair shafts and follicles, oil glands, lymph vessels, nerves, fatty tissue, veins, arteries, and a sweat gland.

### Skin cancer is the most common cancer in the United States.

There are two main types of skin cancer:

- Nonmelanoma or keratinocyte carcinoma which includes:
  - Squamous cell carcinoma [SCC].
  - Basal cell carcinoma.
- Melanoma.

Basal cell carcinoma and squamous cell carcinoma of the skin, also called nonmelanoma skin cancer or keratinocyte carcinoma, are the most common forms of skin cancer. Most basal cell and squamous cell skin cancers can be cured.

Melanoma is more likely to spread to nearby tissues and other parts of the body and can be harder to cure. Melanoma is easier to cure if the tumor is found before it spreads to the dermis (inner layer of skin). Melanoma is less likely to cause death when it is found and treated early.

Anatomy of the skin, showing the epidermis, dermis, and subcutaneous tissue. Melanocytes are in the layer of basal cells at the deepest part of the epidermis.

Anatomy of the skin with melanocytes; drawing shows normal skin anatomy, including the epidermis, dermis, hair follicles, sweat glands, hair shafts, veins, arteries, fatty tissue, nerves, lymph vessels, oil glands, and subcutaneous tissue. The pullout shows a close-up of the squamous cell and basal cell layers of the epidermis above the dermis with blood vessels. Melanin is shown in the cells. A melanocyte is shown in the layer of basal cells at the deepest part of the epidermis.

In the United States, about 3 million cases of nonmelanoma skin cancer or keratinocyte carcinoma are diagnosed each year, and rates have likely been increasing for decades but have recently stabilized. Greater public awareness has led to higher rates of screening exams, self-exams, and detection of these skin cancers.

Since the early 2000s, the rate of melanoma cases in adults younger than 50 years has held steady in women, but decreased by about 1% per year in men. From 2015 to 2019, the rate of melanoma cases in adults aged 50 years and older appeared to hold steady in men, but increased by about 1% per year in women. From 2011 to 2020, the number of deaths from melanoma decreased by about 5% per year in adults younger than 50 years and by 3% per year in adults aged 50 years and older.

The rate of melanoma cases in children and adolescents increased until 2002. However, between 2002 and 2019, the yearly rates of melanoma in these age groups decreased slightly.

For more information about skin cancer, see the following:

- Skin Cancer Prevention
- Skin Cancer Treatment
- Melanoma Treatment
- Genetics of Skin Cancer
- Childhood Melanoma
- Childhood Basal Cell Carcinoma and Squamous Cell Carcinoma of the Skin

### Different factors increase or decrease the risk of skin cancer.

Anything that increases your chance of getting a disease is called a risk factor. Anything that decreases your chance of getting a disease is called a protective factor.

For information about risk and protective factors for skin cancer, see Skin Cancer Prevention.

## Skin Cancer Screening

Key Points for This Section
- Tests are used to screen for different types of cancer when a person does not have symptoms.
- Screening for skin cancer may include examination by both the patient and the health care provider.
- Screening tests for skin cancer are being studied in clinical trials.

### Tests are used to screen for different types of cancer when a person does not have symptoms.

Scientists study screening tests to find those with the fewest harms and most benefits. Cancer screening trials also are meant to show whether early detection (finding cancer before it causes symptoms) helps a person live longer or decreases a person's chance of dying from the disease. For some types of cancer, the chance of recovery is better if the disease is found and treated at an early stage. There is not enough evidence to know if screening the population for skin cancer lowers the rates of death from skin cancer.

### Screening for skin cancer may include examination by both the patient and the health care provider.

A visual self-exam by the patient and a clinical examination by the health care provider may be used to screen for skin cancer.

During a skin exam a doctor or nurse checks the skin for moles, birthmarks, or other pigmented areas that look abnormal in color, size, shape, or texture. Skin exams to screen for skin cancer have not been shown to decrease the number of deaths from the disease.

Regular skin checks by a doctor are important for people who have already had skin cancer. If you are checking your skin and find a worrisome change, you should report it to your doctor.

If an area on the skin looks abnormal, a biopsy is usually done. The doctor will remove as much of the suspicious tissue as possible with a local excision. A pathologist then looks at the tissue under a microscope to check for cancer cells. Because it is sometimes difficult to tell if a skin growth is benign (not cancer) or malignant (cancer), you may want to have the biopsy sample checked by a second pathologist.

Most melanomas in the skin can be seen by the naked eye. Usually, melanoma grows for a long time under the top layer of skin (the epidermis) but does not grow into the deeper layer of skin (the dermis). This allows time for skin cancer to be found early. Melanoma is easier to cure if it is found before it spreads.

Mobile phone applications ("apps") that evaluate skin lesions to detect skin cancer and malignant melanoma have been developed. However, these apps require further study in large-scale testing programs to find out if they are accurate and useful for skin cancer screening.

### Screening tests for skin cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## Risks of Skin Cancer Screening

Key Points for This Section
- Screening tests have risks.
- The risks of skin cancer screening tests include the following:
  - Finding skin cancer does not always improve health or help you live longer.
  - False-negative test results can occur.
  - False-positive test results can occur.
  - A biopsy may cause scarring.

### Screening tests have risks.

Decisions about screening tests can be difficult. Not all screening tests are helpful and most have risks. Before having any screening test, you may want to discuss the test with your doctor. It is important to know the risks of the test and whether it has been proven to reduce the risk of dying from cancer.

### The risks of skin cancer screening tests include the following:

#### Finding skin cancer does not always improve health or help you live longer.

Screening may not improve your health or help you live longer if you have advanced skin cancer.

Some cancers never cause symptoms or become life-threatening, but if found by a screening test, the cancer may be treated. Treatments for cancer may have serious side effects.

#### False-negative test results can occur.

Screening test results may appear to be normal even though cancer is present. A person who receives a false-negative test result (one that shows there is no cancer when there really is) may delay getting medical care even if there are symptoms.

#### False-positive test results can occur.

Screening test results may appear to be abnormal even though no cancer is present. A false-positive test result (one that shows there is cancer when there really isn't) can cause anxiety and is usually followed by more tests (such as a biopsy), which also have risks.

#### A biopsy may cause scarring.

When a skin biopsy is done, the doctor will try to leave the smallest scar possible, but there is a risk of scarring and infection.

Talk to your doctor about your risk for skin cancer and your need for screening tests.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about skin cancer screening. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Skin Cancer Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/skin/patient/skin-screening-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389182]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).